# Childhood Thyroid Cancer Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of childhood thyroid cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Childhood Thyroid Cancer

### Incidence

In the United States, the annual incidence of thyroid cancers is 10.7 cases per 1 million in people aged 0 to 19 years. The incidence is higher in females than in males (17.6 vs. 4.1 cases per 1 million people, respectively) and lower in Black people than in White people (3.9 vs. 11.8 cases per 1 million people, respectively). It accounts for approximately 6% of all cancers in this age group.[1] Thyroid cancer incidence is higher in children aged 15 to 19 years (34.4 cases per 1 million people), and it accounts for approximately 14% of all cancers arising in this older age group.[1] The trend toward larger tumors suggests that diagnostic scrutiny is not the only explanation for the observed results.[2]

Two time-trend studies using the Surveillance, Epidemiology, and End Results (SEER) Program database have shown a 2% and 3.8% annual increase in the incidence of differentiated thyroid carcinoma in the United States among children, adolescents, and young adults in the 1973 to 2011 and 1984 to 2010 periods, respectively.[2,3] Newer data from the National Childhood Cancer Registry show an average annual increase in incidence rates of 1.2% between 2012 and 2021, without changes in survival.[1] A similar trend has been documented in other countries.[4,5]

The papillary subtype is the most common subtype of childhood thyroid cancer, accounting for approximately 60% of cases, followed by the papillary follicular variant subtype (20%–25%), the follicular subtype (10%), and the medullary subtype (<10%). The anaplastic subtype occurs in less than 1% of pediatric thyroid carcinomas. The incidence of the papillary subtype and its follicular variant peaks between the ages of 15 and 19 years. The incidence of medullary thyroid cancer is the highest in children aged 0 to 4 years and declines at older ages (see Figure 1).[6]

Figure 1. Incidence of pediatric thyroid carcinoma based on most frequent subtype per 100,000 as a percent of total cohort. Reprinted from International Journal of Pediatric Otorhinolaryngology (https://www.sciencedirect.com/journal/international-journal-of-pediatric-otorhinolaryngology), Volume 89, Sarah Dermody, Andrew Walls, Earl H. Harley Jr., Pediatric thyroid cancer: An update from the SEER database 2007–2012, Pages 121–126, Copyright (2016), with permission from Elsevier.

Chart showing the incidence of pediatric thyroid carcinoma based on most frequent subtype per 100,000 as a percent of total cohort.

### Diagnostic Evaluation

The prevalence of benign thyroid nodules in childhood has been estimated at about 0.5% to 2%.[7] However, thyroid nodules in children have a higher risk of malignancy (22%–26%) than thyroid nodules in adults (5%–15%).[8] Initial evaluation of a child or adolescent with a thyroid nodule includes the following:

- Ultrasonography of the thyroid and neck. Common ultrasonographic features of malignancy include hypoechogenicity, invasive margins, increased intranodular blood flow, microcalcifications, and abnormal cervical lymph nodes. Based on ultrasonographic characteristics, scoring systems have been developed to facilitate selection of nodules that require fine-needle aspiration (FNA) in adults. The most popular of these scoring systems is the Thyroid Imaging Reporting and Data System. However, the higher incidence of differentiated thyroid carcinoma in pediatric thyroid nodules and the lack of validation in the pediatric population limits the extrapolation of these criteria to children.[7,8]
- Serum thyroid-stimulating hormone (TSH) level. Thyroid function is usually normal. Hyperfunctioning nodules have a very low risk of malignancy (2%–6%).[8]
- Serum thyroglobulin level, which is usually elevated in differentiated thyroid carcinoma.
- FNA. The sensitivity, specificity, and accuracy of FNA in children are similar to those in adults, but there is a greater risk of false-negative findings in nodules larger than 4 cm.[8]
  FNA results are categorized according to the six tiers of The Bethesda System for Reporting Thyroid Cytopathology (see Table 1).[8]
  Table 1. Bethesda System for Reporting Thyroid Cytopathology^a^
  Bethesda Category | Cytopathological Category | Malignancy Rate | Suggested Treatment
  I | Nondiagnostic/inadequate | 1%–5% | Repeat FNA (other options: continued US surveillance, lobectomy)
  II | Benign | 0%–10% | Serial US if small, lobectomy if >4 cm
  III | Atypia/follicular lesion of undetermined significance | 0%–44% | Molecular genetics, lobectomy if no concerning mutation, thyroidectomy if BRAF or fusion mutation
  IV | Follicular neoplasm | 60%–71% | Molecular genetics, lobectomy if no concerning mutation, thyroidectomy if BRAF or fusion mutation
  V | Suspicious for malignancy | 70%–86% | Total thyroidectomy +/− central neck dissection
  VI | Malignant | 97%–100% | Total thyroidectomy +/− central neck dissection
  FNA = fine-needle aspiration; US = ultrasonography.
  ^a^Reprinted from Journal of Pediatric Surgery (https://www.sciencedirect.com/journal/journal-of-pediatric-surgery), Volume 55, Issue 11, Emily R. Christison-Lagay, Reto M. Baertschiger, Catherine Dinauer, Gary L. Francis, Marcus M. Malek, Timothy B Lautz, Jennifer H. Aldrink, Christa Grant, Daniel S. Rhee, Peter Ehrlich, Roshni Dasgupta, Shahab Abdessalam, Pediatric differentiated thyroid carcinoma: An update from the APSA Cancer Committee, Pages 2273–2283, Copyright (2020), with permission from Elsevier.[8]
  While molecular testing of thyroid nodules could be helpful in the diagnosis of papillary thyroid carcinoma, there is no evidence to support its use.[7]
- Lymph node evaluation. Examination of the cervical lymph nodes is critically important in stratifying risk and determining operative strategies. Architecturally concerning features found on ultrasound in adults include round shape, irregular margins, calcifications, cystic change, peripheral vascularity, loss of fatty hilum, and heterogeneous echotexture. FNA should be performed on any suspicious lymph nodes in the lateral neck as confirmation of metastatic involvement before lateral neck dissection.[8]

Figure 2. Flowchart showing the initial evaluation, treatment, and follow-up of pediatric thyroid nodules. #The expert panel suggests considering the measurement of serum calcitonin in children suspect of medullary thyroid carcinoma (MTC) based on individual conditions and the preference of the physician (Recommendation 5A). The expert panel suggests that, in selected cases (conditions that suggest MEN2, a positive family history of MEN2, or in case of bulky thyroid disease), the measurement of calcitonin may be of additional value for early diagnosis of MTC (Recommendation 5B). *Malignancy risk (suspicious vs. no suspicion) is based on neck ultrasound characteristics (described in section B2. Risk of malignancy in a thyroid nodule during childhood), history of radiation, and signs of a pre-disposition syndrome. If there is a significant increase in nodule size or the ultrasound characteristics change over time, repeated fine-needle biopsy (FNB) should be performed. **Analysis of the presence of other oncogenic drivers and gene fusions (e.g., RET/PTC and NTRK fusions) may be considered in Bethesda 3, 4, or 5 due to increasing awareness that these are also associated with the presence of papillary thyroid carcinoma (PTC). In case a BRAF V600E mutation is found, the risk of the thyroid nodule being malignant is high but needs to be confirmed, for example, by frozen section during thyroid surgery. ^Total thyroidectomy after proven presence of MTC. ^^Alternatively, FNB can be performed; in case of differentiated thyroid carcinoma (DTC), a total thyroidectomy should be performed. This work is licensed under a Creative Commons Attribution-NonCommercial-NoDerivatives 4.0 International License (https://creativecommons.org/licenses/by-nc-nd/4.0/). Credit: Lebbink, C. A., Links, T. P., Czarniecka, A., Dias, R. P., Elisei, R., Izatt, L., Krude, H., Lorenz, K., Luster, M., Newbold, K., Piccardo, A., Sobrinho-Simões, M., Takano, T., Paul van Trotsenburg, A. S., Verburg, F. A., & van Santen, H. M. (2022). 2022 European Thyroid Association Guidelines for the management of pediatric thyroid nodules and differentiated thyroid carcinoma. European Thyroid Journal, 11(6), e220146. Retrieved Aug 2, 2024, from https://doi.org/10.1530/ETJ-22-0146.

Flowchart showing the initial evaluation, treatment, and follow-up of pediatric thyroid nodules.

### References

National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Vergamini LB, Frazier AL, Abrantes FL, et al.: Increase in the incidence of differentiated thyroid carcinoma in children, adolescents, and young adults: a population-based study. J Pediatr 164 (6): 1481-5, 2014.24630354
Golpanian S, Perez EA, Tashiro J, et al.: Pediatric papillary thyroid carcinoma: outcomes and survival predictors in 2504 surgical patients. Pediatr Surg Int 32 (3): 201-8, 2016.26717936
Pole JD, Zuk AM, Wasserman JD: Diagnostic and Treatment Patterns Among Children, Adolescents, and Young Adults with Thyroid Cancer in Ontario: 1992-2010. Thyroid 27 (8): 1025-1033, 2017.28514192
Schmidt Jensen J, Grønhøj C, Mirian C, et al.: Incidence and Survival of Thyroid Cancer in Children, Adolescents, and Young Adults in Denmark: A Nationwide Study from 1980 to 2014. Thyroid 28 (9): 1128-1133, 2018.29943676
Dermody S, Walls A, Harley EH: Pediatric thyroid cancer: An update from the SEER database 2007-2012. Int J Pediatr Otorhinolaryngol 89: 121-6, 2016.27619041
Lebbink CA, Links TP, Czarniecka A, et al.: 2022 European Thyroid Association Guidelines for the management of pediatric thyroid nodules and differentiated thyroid carcinoma. Eur Thyroid J 11 (6): , 2022.36228315
Christison-Lagay ER, Baertschiger RM, Dinauer C, et al.: Pediatric differentiated thyroid carcinoma: An update from the APSA Cancer Committee. J Pediatr Surg 55 (11): 2273-2283, 2020.32553450

## Differentiated Thyroid Cancer (Papillary/Follicular)

### Risk Factors

Risk factors for pediatric differentiated thyroid cancer include the following:

- Radiation exposure. There is an excessive frequency of papillary thyroid adenoma and carcinoma after radiation exposure, as a result of either environmental contamination or use of ionizing radiation for diagnosis or treatment.[1-4] The risk increases after exposure to a mean dose of more than 0.05 Gy to 0.1 Gy (50–100 mGy), follows a linear dose-response pattern up to 30 Gy, and then declines. The risk of thyroid cancer after radiation exposure is greater at a younger age of exposure and persists more than 45 years after exposure.[4,5] Childhood cancer survivors with subsequent differentiated thyroid carcinomas tend to have, on average, smaller tumors and, more often, bilateral disease. However, no differences between survivors and controls have been documented in the occurrence of surgical complications, recurrence rate, or disease-related death.[6] For more information, see the Subsequent Neoplasms section in Late Effects of Treatment for Childhood Cancer.
  Papillary thyroid carcinoma is the most frequent form of thyroid carcinoma diagnosed after radiation exposure.[5] Molecular alterations, including intrachromosomal rearrangements, are frequently found; among them, RET rearrangements are the most common.[5]
- Thyroid nodule and autoimmune thyroiditis. In a study of 485 nodules in 385 children who underwent fine-needle aspiration, thyroid cancer was present in 108 nodules (24%). Autoimmune thyroiditis, present in 95 patients (25%), was independently associated with an increased risk of thyroid cancer (odds ratio [OR], 2.19; 95% confidence interval [CI], 1.32–3.62). Papillary thyroid carcinoma was more common than follicular thyroid carcinoma. Among the papillary thyroid carcinomas, autoimmune thyroiditis was strongly associated with the diffuse sclerosing variant (OR, 4.74; 95% CI, 1.33–16.9).[7]
- Genetic factors. Genetic factors play a role in a subset of thyroid carcinomas. For thyroid carcinomas of follicular cells, only 5% to 10% are familial cancers. Of those, most familial cases are nonsyndromic, while a minority occur in the setting of well-defined cancer syndromes with known germline alterations, including the following:[8,9]
  - APC-associated polyposis.
  - Carney complex.
  - PTEN hamartoma tumor syndrome.
  - Werner syndrome.
  - DICER1 syndrome.

### Clinical Presentation and Prognostic Factors

Patients with thyroid cancer usually present with a thyroid mass with or without painless cervical adenopathy.[10] Based on medical and family history and clinical findings, the thyroid cancer may be part of a tumor predisposition syndrome such as APC-associated polyposis, PTEN hamartoma tumor syndrome, Carney complex, Werner syndrome, or DICER1 syndrome.[8,9]

In well-differentiated thyroid cancer, male sex, larger tumor size, and distant metastases have been found to have prognostic significance for early mortality. However, even patients in the highest risk group who had distant metastases had a 90% survival rate.[11]

In addition, the following observations have been reported:

- In a cross-sectional study involving 20% of community hospitals in the United States, the clinical presentation of 644 pediatric cases was compared with that of more than 43,000 adult cases. Compared with adults, children had a higher proportion of nodal involvement (31.5% in children vs. 14.7% in adults) and lung metastases (5.7% in children vs. 2.2% in adults).[10]
- Younger age is associated with a more aggressive clinical presentation in differentiated thyroid carcinoma. Higher recurrence rates have been associated with younger age at presentation.[12]
- Larger tumor size (>1 cm), extrathyroidal extension, and multifocal disease were associated with increased risk of nodal metastases.[13]
- Compared with pubertal adolescents, prepubertal children have a more aggressive presentation with a greater degree of extrathyroid extension, lymph node involvement, and lung metastases. However, outcomes are similar in the prepubertal and adolescent groups.[14-16]
- A French registry analysis found similar outcomes in children and young adults who developed papillary thyroid carcinoma after previous radiation therapy, compared with children and young adults who developed spontaneous papillary thyroid carcinoma. However, patients with previous thyroid irradiation for benign disease presented with more invasive tumors and lymph node involvement.[17]
- Tumor gene fusions in RET, ALK, and NTRK have been associated with high-risk clinical features in retrospective studies.
  - In one study of 106 pediatric patients, 80 had identifiable genomic alterations, including 31 with fusion oncogenes (21 with RET, 6 with ALK, and 4 with NTRK). Patients with fusion-positive tumors were younger (aged <10 years, 93%); had a higher proportion of large tumors (>2 cm), extrathyroid extension, and lymph node and lung metastases; and had a higher incidence of recurrent or persistent disease than patients with BRAF-altered tumors. Expression of SLC5A5 (which encodes the sodium-iodide symporter protein, an important determinant of iodine I 131 [131I] avidity) was decreased in children with fusion-positive papillary thyroid carcinomas and in two patients with 131I-refractory disease who harbored an NTRK and RET fusion gene, respectively. The administration of larotrectinib and selpercatinib produced tumor responses and restored radioactive iodine uptake, underscoring the importance of molecular testing in pediatric patients with papillary thyroid cancer.[18]
  - In a second study, 131 pediatric patients were categorized into three groups: RAS-altered (HRAS, KRAS, or NRAS), BRAF-altered (BRAF V600E), and RET or NTRK gene fusions (RET, NTRK1, or NTRK3 fusions).[19] Patients with RET or NTRK gene fusions were significantly more likely to have advanced lymph node disease and distant metastasis and less likely to achieve remission at 1 year, compared with patients in the RAS-altered and BRAF-altered groups.
- A study reported the outcomes of 65 Chinese patients (aged <20 years) with papillary thyroid carcinoma who presented with pulmonary metastases.[20] Twenty patients had persistent pulmonary metastases after treatment with radioiodine, designated as radioactive iodine–refractory (RAIR) disease. No significant difference in pathological characteristics was observed between patients younger than 15 years and patients aged 15 to 20 years, but younger patients were more likely to have RAIR disease (hazard ratio [HR], 3.500; 95% CI, 1.134–10.803; P = .023). RAIR disease was identified as an independent predictor of progressive disease (HR, 10.008; 95% CI, 2.427–41.268; P = .001). The Kaplan-Meier curve revealed lower progression-free survival (PFS) and disease-specific survival rates in the RAIR group than in the radioactive iodine–avid group (P < .001 and P = .039). Likewise, RAIR disease was a risk factor for unfavorable PFS in patients younger than 15 years (P < .001).

A review of the National Cancer Database found that patients aged 21 years and younger from lower-income families and those lacking insurance experienced a longer period from diagnosis to treatment of their well-differentiated thyroid cancer and presented with higher-stage disease.[21]

A single-institution retrospective review analyzed the impact of multifocal disease at presentation for patients with papillary thyroid carcinoma.[22] The study compared 283 children and adolescents with 5,564 adults. Multifocal disease was less common in children and adolescents with papillary thyroid carcinoma (45%; 127 of 283 patients) than in adults (54%; 3,023 of 5,564 adults; P = .002). There was no significant difference in 5-year recurrence-free probability, and the overall survival (OS) rate was 100% in both groups. There was no significant difference in the 5-year contralateral lobe papillary thyroid carcinoma–free probability between patients with unifocal disease and multifocal disease treated with lobectomy. The authors concluded that multifocal disease does not appear to warrant complete thyroidectomy in children and adolescents selected for lobectomy.

A single-institution study compared diagnostic whole-body 131I scans with stimulated thyroglobulin (sTg) levels as predictors of distant metastasis in children with papillary thyroid carcinoma.[23] A total of 142 patients (median age, 14.6 years; range, 4–18 years) were followed for 9.5 (±7.2) years and classified according to the American Thyroid Association risk of recurrence as low (28%), intermediate (16%), or high risk (56%). Of these patients, 127 had sTg evaluated. An sTg value of 21.7 ng/dL yielded a sensitivity of 88%, compared with 30% for diagnostic whole-body 131I scans, in predicting distant metastasis. Specificity was 60% for sTg levels and 100% for diagnostic whole-body 131I scans. Forty-two percent of patients obtained discordant results between diagnostic whole-body 131I scans and radioiodine therapy posttreatment whole-body 131I scans. In high-risk patients, sTg levels were particularly able to identify those who would have distant metastasis, with better diagnostic accuracy than whole-body 131I scans.

### Histology and Molecular Features of Differentiated Thyroid Cancer

Tumors of the thyroid are classified as adenomas or carcinomas.[9,24] Adenomas are benign, well circumscribed, and encapsulated nodules that may cause notable enlargement of all or part of the gland, which extends to both sides of the neck. Some tumors may secrete hormones. Transformation to a malignant carcinoma may occur in some cells, which may grow and spread to lymph nodes in the neck or to the lungs. Approximately 20% of thyroid nodules in children are malignant.[9]

#### Histology

Papillary and follicular carcinomas are often referred to as differentiated thyroid carcinoma. The pathological classification of differentiated thyroid carcinomas is based on standard definitions set by the World Health Organization, and the criteria are the same for children and adults. Long-term outcomes for children and adolescents with differentiated thyroid carcinoma are excellent, with 10-year survival rates exceeding 95%.[9,25,26]

- Papillary thyroid carcinoma accounts for 90% or more of all cases of differentiated thyroid carcinoma occurring during childhood and adolescence. Pediatric papillary thyroid carcinoma may present with a variety of histological variants: classic, solid, follicular, and diffuse sclerosing.[27] Papillary thyroid carcinoma is frequently multifocal and bilateral, and it metastasizes to regional lymph nodes in most children. Hematogenous metastases to the lungs occur in up to 25% of cases.[9,28]
- Follicular thyroid carcinoma is uncommon. It is typically a unifocal tumor and more prone to initial hematogenous metastases to lungs and bones. Metastases to regional lymph nodes are uncommon. Histological variants of follicular thyroid cancer include Hürthle cell (oncocytic), clear cell, and insular (poorly differentiated) carcinoma.[9]

#### Molecular features

Thyroid tumorigenesis and progression of thyroid carcinomas of follicular cells (differentiated thyroid carcinoma, poorly differentiated papillary thyroid carcinoma, and anaplastic thyroid carcinoma) are defined by a multistep process that results in aberrant activation of the MAPK and/or PI3K/PTEN/AKT signaling pathways. Comprehensive genomic studies performed over the last decade have defined the landscape of these tumors, as well as their genotype-phenotype correlations. Using advanced sequencing technologies, oncogenic alterations are found in more than 90% of tumors.[29]

Variants in BRAF and RAS genes are the most common drivers, followed by gene fusions involving RET or NTRK:[8,30,31]

- BRAF: Single nucleotide variants of the BRAF gene are the most common alterations found in thyroid carcinoma. The most common variant is V600E (95% of BRAF-altered cases). BRAF variants are found in 40% to 80% of papillary thyroid carcinomas and in a lower proportion of poorly differentiated papillary thyroid carcinoma (5%–35%) and anaplastic thyroid carcinoma (10%–50%).[8,31]
  The presence of BRAF V600E has been associated with extrathyroidal tumor extension and an increased risk of recurrence. However, its prognostic significance is controversial. BRAF V600E tumors appear to show a broadly immunosuppressive profile with high expression of anti–programmed death-ligand 1 (PD-L1).[8,31]
  A retrospective analysis of 80 Brazilian patients younger than 18 years with papillary thyroid carcinoma identified AGK::BRAF fusions and BRAF V600E single nucleotide variants.[32] AGK::BRAF fusions, found in 19% of pediatric patients with papillary thyroid carcinoma, were associated with distant metastasis and younger age. BRAF V600E variants, found in 15% of patients with pediatric papillary thyroid carcinoma, were correlated with older age and larger tumor size.
- RAS: Oncogenic RAS activation can occur in any of the RAS family of genes (NRAS, HRAS, and KRAS), although the most frequent alterations are NRAS single nucleotide variants. RAS variants are markers of follicular-patterned thyroid lesions. They are present in 30% to 50% of follicular thyroid carcinomas, 25% to 45% of follicular variants of papillary thyroid carcinoma, and less than 10% of papillary thyroid carcinomas. They are also frequently found in poorly differentiated papillary thyroid carcinoma (20%–50%) and anaplastic thyroid carcinoma (10%–50%) and are believed to promote tumor progression. They have a higher prevalence in areas of iodine deficiency.[8,31]
- RET rearrangements: Multiple RET rearrangements have been identified in approximately 5% to 25% of papillary thyroid carcinomas and in less than 10% of its follicular variant. They are strongly associated with environmental or therapeutic radiation exposure. They are also common among young patients, many of whom present with nodal metastases and aggressive clinicopathological features.[8,31] RET variants have been reported to be more common in the diffuse sclerosing variant of papillary carcinoma than in standard nonsclerosing papillary carcinoma (83% vs. 15.4%; P = .0095).[27]
  A retrospective review identified 113 RET fusion–positive tumors among 993 patients with papillary thyroid carcinoma.[33] RET fusion–positive tumors were three times more frequent in pediatric and adolescent patients (29.8%) than in adult patients (8.7%). A total of 20 types of RET fusions were identified. RET fusion–positive carcinomas were associated with aggressive tumor behavior, including high rates of lymph node metastases (75.2%) and distant metastases (18.6%). These rates were significantly higher than in carcinomas with NTRK fusions, BRAF V600E variants, and RAS variants. Local and distant metastases were also frequently found in patients with microcarcinomas positive for RET fusions. True recurrences occurred rarely (2.4%) and only in adult patients. The disease-specific survival rates were 99% at 2 years, 96% at 5 years, and 95% at 10 years.
- NTRK rearrangements: Rearrangements of NTRK1 and NTRK3 have been described in approximately 5% of papillary thyroid carcinomas. However, ETV6::NTRK3 fusion genes have been reported in 15% of radiation-induced papillary thyroid carcinomas. In young patients and children, NTRK-rearranged papillary thyroid carcinomas may present with lymph node metastases and aggressive clinicopathological features, similar to the presentation of RET-rearranged tumors.[8,31]
- DICER1 variants: Pathogenic variants of DICER1 have been identified in approximately 10% of papillary thyroid carcinomas.[34] DICER1 variants have also been described in a small cohort of patients with poorly differentiated thyroid carcinomas.[35]
  A study correlated the status of hotspot DICER1 variants with clinical, histological, and outcome features in a series of 56 pediatric patients with papillary thyroid carcinomas. These patients had no clinical or family history of DICER1-related syndromic manifestations.[36] Fifteen papillary thyroid carcinomas (27%) harbored BRAF p.V600E. Eight cases of papillary thyroid carcinomas (14%) harbored DICER1 variants, with no associated BRAF p.V600E. DICER1 variants were identified in exons 26 and 27. A novel D1810del (c.5428_5430delGAT) variant was also detected. The study confirmed the absence of hotspot DICER1 variants in the matched nontumor tissue DNA in all eight DICER1-related papillary thyroid carcinomas. The study concluded that the increased incidence in female patients and enrichment in low-risk follicular-patterned papillary thyroid carcinomas are characteristics of DICER1-related papillary thyroid carcinomas.
  A study profiled miRNA in 20 non-neoplastic thyroid tissue specimens, 8 adenomatous specimens, and 60 pediatric thyroid cancer specimens, 8 of which had DICER1 RNase IIIb variants. All differentiated thyroid cancers with DICER1 variants were follicular. Six were follicular variant papillary thyroid cancers, and two were follicular thyroid cancers.[37]

Other alterations include the following:[8,31]

- ALK rearrangements have been described in less than 10% of papillary thyroid carcinomas and are commonly associated with dedifferentiation.
- Activating variants of AKT1 have been described in 19% of recurrent or metastatic poorly differentiated papillary thyroid carcinomas.
- PPARG rearrangements are present in 20% to 50% of follicular thyroid carcinomas and in a lower proportion of follicular variants of papillary thyroid carcinoma.
- TERT-activating variants are commonly seen in poorly differentiated papillary thyroid carcinomas (20%–50%) and anaplastic thyroid carcinomas (30%–75%). These variants have also been reported in 10% to 35% of follicular thyroid carcinomas and 5% to 15% of papillary thyroid carcinomas. TERT variants are believed to promote tumor progression to poorly differentiated papillary thyroid carcinoma and anaplastic thyroid carcinoma and represent a negative prognostic marker.
- TP53 is altered in 40% to 80% of anaplastic thyroid carcinomas and 10% to 35% of poorly differentiated papillary thyroid carcinomas. It is considered a final step of tumor progression and a marker for poor prognosis.

The spectrum of somatic genetic alterations seems to differ between pediatric and adult patients when analyzing tumors with similar histologies, as follows:[29,30,38,39]

- Gene fusions involving RET or, less frequently, NTRK account for approximately 50% of the molecular alterations in pediatric differentiated thyroid carcinoma, compared with approximately 15% in adults.
- Gene alterations involving BRAF or RAS, which are present in approximately 70% of thyroid carcinomas diagnosed in adults, are noted in 20% to 40% of pediatric tumors. BRAF variants have been described in approximately 20% to 30% of cases, while RAS variants are much less frequently found in pediatrics (5%–10%).
- When combining evaluation of DNA and RNA, targetable alterations can be identified in approximately 98% of childhood thyroid carcinomas.

### Treatment of Papillary and Follicular Thyroid Carcinoma

Treatment options for papillary and follicular (differentiated) thyroid carcinoma include the following:

1. Surgery.
2. Radioactive iodine ablation (RAI).

Because differentiated thyroid cancer is rare in children, centralization of care to expert centers is highly encouraged.[6,9,24]

In 2015, the American Thyroid Association (ATA) Task Force on Pediatric Thyroid Cancer published guidelines for the management of thyroid nodules and differentiated thyroid cancer in children and adolescents. These guidelines are based on scientific evidence and expert panel opinion, with a careful assessment of the level of evidence.[9] In 2020 and 2022, the Cancer Committee of the American Pediatric Surgery Association and the European Thyroid Association (ETA) reviewed and expanded the ATA guidelines by incorporating more recent evidence.[24] The following sections of this summary provide an overview of the ATA guidelines and the proposed revisions, which are presented here without a specific endorsement by the National Cancer Institute (NCI).

#### Preoperative evaluation

Preoperative evaluation factors to consider include the following:

- Neck palpation and a comprehensive ultrasonography of all regions of the neck using a high-resolution probe and Doppler technique should be obtained by an experienced ultrasonographer. A complete ultrasonography examination should be performed before surgery.[6,9]
- The addition of cross-sectional imaging (contrast-enhanced computed tomography [CT] or magnetic resonance imaging) should be considered when there is concern about invasion of the aerodigestive tract. Importantly, if iodinated contrast agents are used, further evaluation and treatment with radioactive iodine may need to be delayed for 2 to 3 months until total body iodine burden decreases.[9]
- Chest imaging (x-ray or CT) may be considered for patients with substantial cervical lymph node disease.[9]
- Thyroid nuclear scintigraphy should be pursued only if the patient presents with suppressed thyroid-stimulating hormone (TSH).[9]
- The routine use of bone scan or fluorine F 18-fludeoxyglucose positron emission tomography (PET) is not recommended.[9]
- Further genetic or imaging diagnostics should be considered in cases of suspected familiar or extensive disease.[6]

#### Surgery

Total thyroidectomy is the cornerstone of the management of differentiated thyroid carcinoma. Pediatric thyroid surgery is ideally completed by a surgeon who has experience performing endocrine procedures in children and in a hospital with the full spectrum of pediatric specialty care. The ATA recommends that the thyroidectomy be performed by an experienced thyroid surgeon (>30 cases/year) or as a multidisciplinary approach between a pediatric surgeon and an adult endocrine or head and neck surgeon.[6,9]

##### Thyroidectomy

For patients with papillary or follicular carcinoma, total thyroidectomy is the recommended treatment. The ATA expert panel recommendation is based on data showing an increased incidence of bilateral (30%) and multifocal (65%) disease.[6,9]

In patients with a small unilateral tumor confined to the gland, a near-total thyroidectomy—in which a small amount of thyroid tissue (<1%–2%) is left in place at the entry point of the recurrent laryngeal nerve or superior parathyroid glands—might be considered to decrease permanent damage to those structures.[40]

A retrospective analysis identified factors associated with bilateral thyroid involvement in 115 pediatric patients with well-differentiated thyroid cancer.[41] Bilateral disease was present in 47 of 115 participants (41%). In multivariable analysis, only multifocality in the primary lobe was independently associated with bilateral disease (OR, 7.61; 95% CI, 2.44–23.8; P < .001). Among clinically node-negative patients with papillary carcinoma who did not have tumor multifocality in the primary lobe, bilateral disease was present in 5 of 32 patients (16%). The authors concluded that in children with differentiated thyroid cancer, tumor multifocality in the primary lobe is associated with bilateral disease, and they recommended prompt consideration of complete thyroidectomy after initial lobectomy.

Another multicenter retrospective analysis evaluated the prevalence of and risk factors for multifocal disease in 212 pediatric patients with papillary thyroid carcinoma.[42] The mean age at diagnosis was 14.1 years, and 23 patients were aged 10 years or younger. A total of 173 patients (82%) were female. Any amount of multifocal disease was present in 98 cases (46%), with bilateral multifocal disease present in 73 cases (34%). Predictors for multifocal and bilateral multifocal disease included age 10 years or younger, T3 tumor stage, and N1b nodal stage. The authors concluded that these risk factors and the high prevalence of multifocal disease should be considered when assessing the risks and benefits of surgical management options in pediatric patients with papillary thyroid carcinoma.

Thyroid resections that are less than a total thyroidectomy are associated with up to tenfold greater recurrence rates. Total thyroidectomy also optimizes the use of radioactive iodine for imaging and treatment.

##### Central neck dissection

A therapeutic central neck lymph node dissection (level VI nodes) should be done in the presence of clinical evidence of central or lateral neck metastases.[13]

For patients without clinical evidence of gross extrathyroidal invasion or locoregional metastasis, a prophylactic central neck dissection may be considered based on tumor focality and primary tumor size. However, because of the increased morbidity associated with central lymph node dissection, it is important to consider the risks and benefits of the extent of dissection on a case-by-case basis.[43]

##### Lateral neck dissection

Modified radical neck dissection is reserved for biopsy-proven metastatic disease in the lateral compartment (levels II, III, IV, and V). Cytological confirmation of metastatic disease to lymph nodes in the lateral neck is recommended before surgery.

Routine prophylactic lateral neck dissection is not recommended.

Figure 3. Flowchart showing the surgical approach for differentiated thyroid carcinoma (DTC) in children. BCLND, bilateral central lymph node dissection; CLND, central lymph node dissection; FNB, fine needle biopsy; ICLND, ipsilateral central lymph node dissection. ‘Active surveillance’ in low-risk DTC implies ultrasound of the leftover thyroid tissue, including the evaluation of the cervical lymph nodes every 6–12 months by neck palpation and ultrasound. This work is licensed under a Creative Commons Attribution-NonCommercial-NoDerivatives 4.0 International License (https://creativecommons.org/licenses/by-nc-nd/4.0/). Credit: Lebbink, C. A., Links, T. P., Czarniecka, A., Dias, R. P., Elisei, R., Izatt, L., Krude, H., Lorenz, K., Luster, M., Newbold, K., Piccardo, A., Sobrinho-Simões, M., Takano, T., Paul van Trotsenburg, A. S., Verburg, F. A., & van Santen, H. M. (2022). 2022 European Thyroid Association Guidelines for the management of pediatric thyroid nodules and differentiated thyroid carcinoma. European Thyroid Journal, 11(6), e220146. Retrieved Aug 2, 2024, from https://doi.org/10.1530/ETJ-22-0146.

Flowchart showing the surgical approach for differentiated thyroid carcinoma in children.

#### Classification and risk assignment

Despite the limited data in pediatrics, the ATA Task Force recommends the use of the tumor-node-metastasis (TNM) classification system to categorize patients into one of three risk groups.[9] This categorization strategy is meant to define the risk of persistent cervical disease and help determine which patients should undergo postoperative staging for the presence of distant metastasis.

- ATA pediatric low risk: Disease confined to the thyroid with N0 or NX disease or patients with incidental N1a (microscopic metastasis to a small number of central neck nodes). These patients are at lowest risk of distant disease but may still be at risk of residual cervical disease, especially if the initial surgery did not include central neck dissection.
- ATA pediatric intermediate risk: Extensive N1a or minimal N1b disease. These patients are at low risk of distant metastasis but are at an increased risk of incomplete lymph node resection and persistent cervical disease.
- ATA pediatric high risk: Regionally extensive disease (N1b) or locally invasive disease (T4), with or without distant metastasis. Patients in this group are at the highest risk of incomplete resection, persistent disease, and distant metastasis.

For more information about the TNM system, see the Stage Information for Thyroid Cancer section in Thyroid Cancer Treatment.

#### Postoperative staging and long-term surveillance

After surgical resection, disease is staged based on the operative findings to identify patients with persistent disease and those at intermediate or high risk of recurrence. Initial staging should be performed within 12 weeks after surgery to assess for evidence of persistent locoregional disease and to identify patients who are likely to benefit from additional therapy with 131I. The ATA pediatric risk level helps determine the extent of postoperative testing.[9] The standard imaging study for the follow-up of patients who have been treated for differentiated thyroid carcinoma is neck ultrasonography. It should be performed by a professional with experience using this procedure in children. The sensitivity and specificity of neck ultrasonography for recurrent differentiated thyroid carcinoma in follow-up for children who have been treated with total thyroidectomy are 85.7% and 89.4%, respectively.[6]

##### ATA pediatric low risk

- Initial postoperative staging includes a TSH-suppressed thyroglobulin. A diagnostic iodine I 123 (123I) scan is not required.
- TSH suppression should be targeted to serum levels of 0.5 to 1.0 mIU/L.
- In patients with no evidence of disease, surveillance should include ultrasonography at 6 months postoperatively and then annually for 5 years, as well as TSH-suppressed thyroglobulin levels every 3 to 6 months for 2 years and then annually.
- In children with positive thyroglobulin antibodies (common in patients with Hashimoto thyroiditis), trending thyroglobulin is less reliable, and a diagnostic 123I scan may be required.

##### ATA pediatric intermediate risk

- Initial postoperative staging includes a TSH-stimulated thyroglobulin and diagnostic 123I whole-body scan for further stratification and determination with 131I.
- TSH suppression should be targeted to serum levels of 0.1 to 0.5 mIU/L.
- In patients with no evidence of disease, surveillance should include ultrasonography at 6 months postoperatively and then every 6 to 12 months for 5 years (and then less frequently), as well as thyroglobulin levels (on hormone replacement therapy) every 3 to 6 months for 3 years and then annually.
- TSH-stimulated thyroglobulin and diagnostic 123I scan should be considered in 1 to 2 years for patients treated with 131I.

##### ATA pediatric high risk

- Initial postoperative staging includes a TSH-stimulated thyroglobulin and diagnostic 123I whole-body scan for further stratification and determination with 131I.
- TSH suppression should be targeted to serum levels of less than 0.1 mIU/L.
- In patients with no evidence of disease, surveillance should include ultrasonography at 6 months postoperatively and then every 6 to 12 months for 5 years (and then less frequently), as well as thyroglobulin levels (on hormone replacement therapy) every 3 to 6 months for 3 years and then annually.
- TSH-stimulated thyroglobulin and, possibly, a diagnostic 123I scan in 1 to 2 years in patients treated with 131I.

For patients with antithyroglobulin antibodies, deferred postoperative staging to allow time for antibody clearance, except in patients with T4 or M1 disease.

#### Radioactive iodine ablation (RAI)

The goal of 131I therapy is to decrease recurrence and mortality by eliminating iodine-avid disease.[6,9]

- The ATA Task Force recommends the use of 131I for the treatment of iodine-avid, persistent locoregional, or nodal disease that cannot be resected, and for known or presumed iodine-avid distant metastases. For patients with persistent disease after administration of 131I, the decision to pursue additional 131I therapy should be individualized based on clinical data and previous response. For patients without lymph node or distant metastases, there is no evidence that 131I can improve survival or reduce recurrence rates.[6]
- To facilitate 131I uptake by residual iodine-avid disease, the TSH level should be above 30 mIU/L. This level can be achieved by withdrawing levothyroxine for at least 14 days. A low-iodine diet should also be followed for 2 weeks before therapy. RAI should be deferred for 2 to 3 months after exposure to iodinated CT contrast, and urine iodine excretion should be confirmed to be less than 75 µ/L. In patients who cannot mount an adequate TSH response or cannot tolerate profound hypothyroidism, recombinant human TSH may be used.
- Therapeutic 131I administration is commonly based on either empiric dosing or whole-body dosimetry. Based on the lack of data comparing empiric treatment and treatment informed by dosimetry, the ATA Task Force was unable to recommend one specific approach. However, because of the differences in body size and iodine clearance in children compared with adults, all activities of 131I should be calculated by experts with experience in dosing children.
- A posttreatment whole-body scan is recommended for all children 4 to 7 days after 131I therapy. The addition of single-photon emission CT with integrated conventional CT (SPECT/CT) may help to distinguish the anatomic location of focal uptake.
  While rare, late effects of 131I treatment include salivary gland dysfunction, bone marrow suppression, pulmonary fibrosis, and second malignancies.[44]
- Because response to 131I may be observed up to 15 to 18 months after therapy, long intervals of at least 12 months are suggested before re-treatment.[6]

Evidence (RAI):

1. In a multicenter study of children and adolescents with differentiated thyroid carcinoma, 285 consecutive patients were treated with total thyroidectomy and RAI according to the ATA guidelines.[45]
  - 87% of the patients had no evidence of active disease at a median follow-up of 133 months.
2. In a single-center study of ATA pediatric low-risk differentiated thyroid cancer diagnosed between 2010 and 2020, 95 patients underwent total thyroidectomy followed by 131I therapy in 53% of patients.[46]
  - There was no statistical difference in remission rates between patients treated with or without 131I therapy at 1 year (70% vs. 68.9%, respectively; P = .089) or last clinical evaluation (82% vs. 75.6%; P = .534).
  - Over the study period, use of 131I in the patient population declined steadily, as the 2015 ATA Pediatric Differentiated Thyroid Cancer Guidelines recommended withholding 131I therapy in patients with low-risk disease. Accordingly, patients who received 131I therapy had longer follow-up (median, 5.8 years) than those who did not receive 131I therapy (median, 3.6 years).

The ETA has proposed a simplified follow-up plan based on thyroglobulin levels and neck ultrasonography (see Figure 4).[6]

Figure 4. Flowchart showing the follow-up of children with differentiated thyroid carcinoma (DTC) who achieved complete remission after initial treatment with total thyroidectomy and I-131. This flowchart was developed for children with DTC who achieved complete remission defined as: undetectable levels of serum thyroglobulin (Tg) on levothyroxine (LT4), undetectable levels of Tg antibodies, negative neck ultrasound, and if performed, negative whole-body scan 1 year after last treatment. ^In the first year until clinical remission, TSH levels should be suppressed, while a normal low value of TSH (between 0.5 and 1.0 mIU/L) will be advisable thereafter. ^^The definition of consistently rising Tg on LT4 is debatable; the levels of Tg as well as the doubling time should be taken into account and weighted in the individual patient. *The expert panel suggests that, in children with detectable (but not rising) Tg and no focus on neck ultrasound, I-123 scanning may be considered in individual cases. When both ultrasound and radioiodine imaging did not yield a focus, FDG PET/CT may be considered. This work is licensed under a Creative Commons Attribution-NonCommercial-NoDerivatives 4.0 International License (https://creativecommons.org/licenses/by-nc-nd/4.0/). Credit: Lebbink, C. A., Links, T. P., Czarniecka, A., Dias, R. P., Elisei, R., Izatt, L., Krude, H., Lorenz, K., Luster, M., Newbold, K., Piccardo, A., Sobrinho-Simões, M., Takano, T., Paul van Trotsenburg, A. S., Verburg, F. A., & van Santen, H. M. (2022). 2022 European Thyroid Association Guidelines for the management of pediatric thyroid nodules and differentiated thyroid carcinoma. European Thyroid Journal, 11(6), e220146. Retrieved Aug 2, 2024, from https://doi.org/10.1530/ETJ-22-0146.

Flowchart showing the follow-up of children with differentiated thyroid carcinoma who achieved complete remission after initial treatment with total thyroidectomy and I-131.

### Treatment of Recurrent Papillary and Follicular Thyroid Carcinoma

Despite having more advanced disease at presentation than adults, children with differentiated thyroid cancer generally have an excellent survival with relatively few side effects.[25,47,48] For this reason, treatment of persistent or recurrent disease should be individualized, and the potential risks and benefits of therapy should be carefully considered. For children with persistent but not rising thyroglobulin levels on TSH suppression, primary neck ultrasonography is recommended; if negative, 123I scanning may be considered under TSH stimulation. If no residual or recurrent disease is found, serum thyroglobulin and serum thyroglobulin antibodies must be measured every 3 to 6 months. Patients with small cervical foci (i.e., <1 cm) or patients with cervical disease that cannot be visualized with cross-sectional imaging may be considered for (repeat) therapeutic 131I. However, these patients may also be safely observed while maintaining TSH suppression. Macroscopic cervical disease should be removed surgically if it can be safely accomplished. Children with pulmonary metastases may continue to experience posttherapy targeted 131I effects for years, and an undetectable thyroglobulin level should not be the focus of treatment efforts. As many as one-third of patients exhibit persistent but stable disease following RAI. Therapy should be considered only in patients who show signs of progression.[9,24]

Treatment options for recurrent papillary and follicular thyroid carcinoma include the following:

1. RAI with 131I.
2. Tyrosine kinase inhibitors (TKIs).

#### RAI with 131I

RAI with 131I is usually effective after recurrence.[49]

#### Tyrosine kinase inhibitors (TKIs)

For patients with 131I-refractory disease, molecularly targeted therapies using TKIs may provide alternative therapies.

TKIs with documented efficacy for the treatment of adults include the following:

- Sorafenib. Sorafenib is a VEGFR, PDGFR, and RAS kinase inhibitor. In a randomized phase III trial, sorafenib improved PFS when compared with placebo (10.8 months vs. 5.8 months) in adult patients with radioactive iodine–refractory locally advanced or metastatic differentiated thyroid cancer.[50] The U.S. Food and Drug Administration (FDA) approved sorafenib in 2013 for the treatment of adults with late-stage, metastatic differentiated thyroid carcinoma.
  Pediatric-specific data are limited. However, in one case report, sorafenib produced a radiographic response in a patient aged 8 years with metastatic papillary thyroid carcinoma.[51]
- Lenvatinib. Lenvatinib is an oral VEGFR, FGFR, PDGFR, RET, and KIT inhibitor. In a phase III randomized study of adults with 131I-refractory differentiated thyroid cancer, lenvatinib was associated with a significant improvement in PFS and response rate when compared with a placebo.[52] The FDA approved lenvatinib in 2015 for the treatment of adults with progressive, radioactive iodine–refractory differentiated thyroid carcinoma.
  Three children with papillary thyroid carcinoma who were refractory to radioactive iodine had a clinical response to lenvatinib.[53]
- Vemurafenib and dabrafenib (BRAF inhibitors). An open-label, nonrandomized, phase II study of vemurafenib was conducted in adult patients with papillary thyroid carcinoma that was 131I-refractory, metastatic or unresectable, and BRAF V600E variant positive. No participant had been previously treated with a TKI. A response rate of 38.5% was documented.[54] For patients with metastatic or advanced BRAF V600E–altered anaplastic thyroid carcinoma, the combination of dabrafenib with the MEK inhibitor trametinib showed a response rate of 69%.[55]
- Larotrectinib and entrectinib (NTRK inhibitors). Larotrectinib has been used to treat patients with TRK fusion–positive thyroid carcinoma. In one study, all five patients with TRK fusion–positive thyroid carcinomas who received larotrectinib therapy achieved partial or complete responses.[56] Responses to entrectinib have also been reported.[57] The FDA approved larotrectinib and entrectinib for the treatment of adults and children (restricted to patients older than 12 years for entrectinib) with solid tumors that include all of the following characteristics:[58]
  - Have an NTRK gene fusion without a known acquired resistance variant.
  - Are metastatic or for which surgical resection is likely to result in severe morbidity.
  - Have no satisfactory alternative treatments or that have progressed following treatment.
- Selpercatinib (a RET inhibitor). In a phase I/II trial of selpercatinib therapy for patients (age range, 25–88 years) with RET-altered cancers, 19 patients with RET fusion–positive, previously treated thyroid cancers were enrolled.[59]
  - Fifteen of 19 patients (79%) achieved objective responses (1 complete response and 14 partial responses), and the median duration of response was 18.4 months.
  - The most common grades 3 to 4 treatment-related adverse events were hypertension (12%), increased alanine aminotransferase (10%) and aspartate aminotransferase (7%), diarrhea (3%), and prolonged QT interval (2%).
  - In 2024, the FDA granted full approval to selpercatinib for the treatment of adult and pediatric patients aged 2 years and older with advanced or metastatic RET fusion–positive thyroid cancer who require systemic therapy and who are radioactive iodine–refractory (if radioactive iodine is appropriate).[60]
- Cabozantinib (a VEGFR and RET inhibitor). Cabozantinib and placebo were compared in a double-blind, phase III, randomized trial (COSMIC-311 [NCT03690388] (https://www.cancer.gov/clinicaltrials/NCT03690388)) in adult patients (age range, 55–72 years). These patients had received at least one VEGFR-targeted TKI for differentiated thyroid carcinoma, and their disease was deemed progressive and radioactive iodine–refractory. An effective response was noted in 10 of 67 patients who received cabozantinib, compared with zero responses in the placebo group. The PFS was 11 months (95% CI, 7.4–13.8) in the cabozantinib arm, compared with 1.9 months (95% CI, 1.9–3.7) in the placebo arm, with an HR of 0.22 (95% CI, 0.14–0.31).[61] Based on these data, the FDA approved cabozantinib in this population.[62]

For more information, see Thyroid Cancer Treatment.

#### Treatment options under clinical evaluation for recurrent papillary and follicular thyroid carcinoma

Information about NCI-supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

### References

Cahoon EK, Nadyrov EA, Polyanskaya ON, et al.: Risk of Thyroid Nodules in Residents of Belarus Exposed to Chernobyl Fallout as Children and Adolescents. J Clin Endocrinol Metab 102 (7): 2207-2217, 2017.28368520
Rose J, Wertheim BC, Guerrero MA: Radiation treatment of patients with primary pediatric malignancies: risk of developing thyroid cancer as a secondary malignancy. Am J Surg 204 (6): 881-6; discussion 886-7, 2012.23026382
Lal G, Groff M, Howe JR, et al.: Risk of subsequent primary thyroid cancer after another malignancy: latency trends in a population-based study. Ann Surg Oncol 19 (6): 1887-96, 2012.22227921
Lubin JH, Adams MJ, Shore R, et al.: Thyroid Cancer Following Childhood Low-Dose Radiation Exposure: A Pooled Analysis of Nine Cohorts. J Clin Endocrinol Metab 102 (7): 2575-2583, 2017.28323979
Iglesias ML, Schmidt A, Ghuzlan AA, et al.: Radiation exposure and thyroid cancer: a review. Arch Endocrinol Metab 61 (2): 180-187, 2017 Mar-Apr.28225863
Lebbink CA, Links TP, Czarniecka A, et al.: 2022 European Thyroid Association Guidelines for the management of pediatric thyroid nodules and differentiated thyroid carcinoma. Eur Thyroid J 11 (6): , 2022.36228315
Keefe G, Culbreath K, Cherella CE, et al.: Autoimmune Thyroiditis and Risk of Malignancy in Children with Thyroid Nodules. Thyroid 32 (9): 1109-1117, 2022.35950619
Acquaviva G, Visani M, Repaci A, et al.: Molecular pathology of thyroid tumours of follicular cells: a review of genetic alterations and their clinicopathological relevance. Histopathology 72 (1): 6-31, 2018.29239040
Francis GL, Waguespack SG, Bauer AJ, et al.: Management Guidelines for Children with Thyroid Nodules and Differentiated Thyroid Cancer. Thyroid 25 (7): 716-59, 2015.25900731
Al-Qurayshi Z, Hauch A, Srivastav S, et al.: A National Perspective of the Risk, Presentation, and Outcomes of Pediatric Thyroid Cancer. JAMA Otolaryngol Head Neck Surg 142 (5): 472-8, 2016.27031884
Shayota BJ, Pawar SC, Chamberlain RS: MeSS: A novel prognostic scale specific for pediatric well-differentiated thyroid cancer: a population-based, SEER outcomes study. Surgery 154 (3): 429-35, 2013.23972648
Ye B, Shi J, Shen C, et al.: Comparison of differentiated thyroid carcinoma recurrence and its clinical features in children of different ages. Oncotarget 8 (29): 48051-48059, 2017.28624796
Kim J, Sun Z, Adam MA, et al.: Predictors of nodal metastasis in pediatric differentiated thyroid cancer. J Pediatr Surg 52 (1): 120-123, 2017.27836371
Lazar L, Lebenthal Y, Steinmetz A, et al.: Differentiated thyroid carcinoma in pediatric patients: comparison of presentation and course between pre-pubertal children and adolescents. J Pediatr 154 (5): 708-14, 2009.19167722
Redlich A, Luster M, Lorenz K, et al.: Age, American Thyroid Association Risk Group, and Response to Therapy Are Prognostic Factors in Children With Differentiated Thyroid Cancer. J Clin Endocrinol Metab 107 (1): e165-e177, 2022.34415989
Chesover AD, Vali R, Hemmati SH, et al.: Lung Metastasis in Children with Differentiated Thyroid Cancer: Factors Associated with Diagnosis and Outcomes of Therapy. Thyroid 31 (1): 50-60, 2021.32517539
Sassolas G, Hafdi-Nejjari Z, Casagranda L, et al.: Thyroid cancers in children, adolescents, and young adults with and without a history of childhood exposure to therapeutic radiation for other cancers. Thyroid 23 (7): 805-10, 2013.23286372
Lee YA, Lee H, Im SW, et al.: NTRK and RET fusion-directed therapy in pediatric thyroid cancer yields a tumor response and radioiodine uptake. J Clin Invest 131 (18): , 2021.34237031
Franco AT, Ricarte-Filho JC, Isaza A, et al.: Fusion Oncogenes Are Associated With Increased Metastatic Capacity and Persistent Disease in Pediatric Thyroid Cancers. J Clin Oncol 40 (10): 1081-1090, 2022.35015563
Tian T, Huang S, Dai H, et al.: Radioactive Iodine-Refractory Pulmonary Metastases of Papillary Thyroid Cancer in Children, Adolescents, and Young Adults. J Clin Endocrinol Metab 108 (2): 306-314, 2023.36226635
Garner EF, Maizlin II, Dellinger MB, et al.: Effects of socioeconomic status on children with well-differentiated thyroid cancer. Surgery 162 (3): 662-669, 2017.28602495
Scholfield DW, Lopez J, Eagan A, et al.: Is Multifocality a Predictor of Poor Outcome in Childhood and Adolescent Papillary Thyroid Carcinoma? J Clin Endocrinol Metab 108 (12): 3135-3144, 2023.37350510
Garcia Alves-Junior PA, de Andrade Barreto MC, de Andrade FA, et al.: Stimulated thyroglobulin and diagnostic 131-iodine whole-body scan as a predictor of distant metastasis and association with response to treatment in pediatric thyroid cancer patients. Endocrine 84 (3): 1081-1087, 2024.38296913
Christison-Lagay ER, Baertschiger RM, Dinauer C, et al.: Pediatric differentiated thyroid carcinoma: An update from the APSA Cancer Committee. J Pediatr Surg 55 (11): 2273-2283, 2020.32553450
Dermody S, Walls A, Harley EH: Pediatric thyroid cancer: An update from the SEER database 2007-2012. Int J Pediatr Otorhinolaryngol 89: 121-6, 2016.27619041
National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Brady C, Manning SC, Rudzinski E, et al.: Clinical Outcomes of Diffuse Sclerosing Variant Papillary Thyroid Carcinoma in Pediatric Patients. Laryngoscope 132 (5): 1132-1138, 2022.34713899
Sugino K, Nagahama M, Kitagawa W, et al.: Distant Metastasis in Pediatric and Adolescent Differentiated Thyroid Cancer: Clinical Outcomes and Risk Factor Analyses. J Clin Endocrinol Metab 105 (11): , 2020.32813019
Stosic A, Fuligni F, Anderson ND, et al.: Diverse Oncogenic Fusions and Distinct Gene Expression Patterns Define the Genomic Landscape of Pediatric Papillary Thyroid Carcinoma. Cancer Res 81 (22): 5625-5637, 2021.34535459
Bauer AJ: Molecular Genetics of Thyroid Cancer in Children and Adolescents. Endocrinol Metab Clin North Am 46 (2): 389-403, 2017.28476228
Cancer Genome Atlas Research Network: Integrated genomic characterization of papillary thyroid carcinoma. Cell 159 (3): 676-90, 2014.25417114
Sisdelli L, Cordioli MICV, Vaisman F, et al.: AGK-BRAF is associated with distant metastasis and younger age in pediatric papillary thyroid carcinoma. Pediatr Blood Cancer 66 (7): e27707, 2019.30924609
Bulanova Pekova B, Sykorova V, Mastnikova K, et al.: RET fusion genes in pediatric and adult thyroid carcinomas: cohort characteristics and prognosis. Endocr Relat Cancer 30 (12): , 2023.37882481
Wasserman JD, Sabbaghian N, Fahiminiya S, et al.: DICER1 Mutations Are Frequent in Adolescent-Onset Papillary Thyroid Carcinoma. J Clin Endocrinol Metab 103 (5): 2009-2015, 2018.29474644
Chernock RD, Rivera B, Borrelli N, et al.: Poorly differentiated thyroid carcinoma of childhood and adolescence: a distinct entity characterized by DICER1 mutations. Mod Pathol 33 (7): 1264-1274, 2020.31937902
Onder S, Mete O, Yilmaz I, et al.: DICER1 Mutations Occur in More Than One-Third of Follicular-Patterned Pediatric Papillary Thyroid Carcinomas and Correlate with a Low-Risk Disease and Female Gender Predilection. Endocr Pathol 33 (4): 437-445, 2022.36251117
Ricarte-Filho JC, Casado-Medrano V, Reichenberger E, et al.: DICER1 RNase IIIb domain mutations trigger widespread miRNA dysregulation and MAPK activation in pediatric thyroid cancer. Front Endocrinol (Lausanne) 14: 1083382, 2023.36896180
Potter SL, Reuther J, Chandramohan R, et al.: Integrated DNA and RNA sequencing reveals targetable alterations in metastatic pediatric papillary thyroid carcinoma. Pediatr Blood Cancer 68 (1): e28741, 2021.33009870
Pekova B, Sykorova V, Dvorakova S, et al.: RET, NTRK, ALK, BRAF, and MET Fusions in a Large Cohort of Pediatric Papillary Thyroid Carcinomas. Thyroid 30 (12): 1771-1780, 2020.32495721
Spinelli C, Strambi S, Rossi L, et al.: Surgical management of papillary thyroid carcinoma in childhood and adolescence: an Italian multicenter study on 250 patients. J Endocrinol Invest 39 (9): 1055-9, 2016.27129982
Cherella CE, Richman DM, Liu E, et al.: Predictors of Bilateral Disease in Pediatric Differentiated Thyroid Cancer. J Clin Endocrinol Metab 106 (10): e4242-e4250, 2021.33780538
Banik GL, Shindo ML, Kraimer KL, et al.: Prevalence and Risk Factors for Multifocality in Pediatric Thyroid Cancer. JAMA Otolaryngol Head Neck Surg 147 (12): 1100-1106, 2021.34734994
Machens A, Elwerr M, Thanh PN, et al.: Impact of central node dissection on postoperative morbidity in pediatric patients with suspected or proven thyroid cancer. Surgery 160 (2): 484-92, 2016.27117577
Albano D, Bertagna F, Panarotto MB, et al.: Early and late adverse effects of radioiodine for pediatric differentiated thyroid cancer. Pediatr Blood Cancer 64 (11): , 2017.28436606
Cistaro A, Quartuccio N, Garganese MC, et al.: Prognostic factors in children and adolescents with differentiated thyroid carcinoma treated with total thyroidectomy and RAI: a real-life multicentric study. Eur J Nucl Med Mol Imaging 49 (4): 1374-1385, 2022.34664092
Bojarsky M, Baran JA, Halada S, et al.: Outcomes of ATA Low-Risk Pediatric Thyroid Cancer Patients Not Treated With Radioactive Iodine Therapy. J Clin Endocrinol Metab 108 (12): 3338-3344, 2023.37265226
Golpanian S, Perez EA, Tashiro J, et al.: Pediatric papillary thyroid carcinoma: outcomes and survival predictors in 2504 surgical patients. Pediatr Surg Int 32 (3): 201-8, 2016.26717936
Vergamini LB, Frazier AL, Abrantes FL, et al.: Increase in the incidence of differentiated thyroid carcinoma in children, adolescents, and young adults: a population-based study. J Pediatr 164 (6): 1481-5, 2014.24630354
Powers PA, Dinauer CA, Tuttle RM, et al.: Treatment of recurrent papillary thyroid carcinoma in children and adolescents. J Pediatr Endocrinol Metab 16 (7): 1033-40, 2003.14513881
Brose MS, Nutting CM, Jarzab B, et al.: Sorafenib in radioactive iodine-refractory, locally advanced or metastatic differentiated thyroid cancer: a randomised, double-blind, phase 3 trial. Lancet 384 (9940): 319-28, 2014.24768112
Iyer P, Mayer JL, Ewig JM: Response to sorafenib in a pediatric patient with papillary thyroid carcinoma with diffuse nodular pulmonary disease requiring mechanical ventilation. Thyroid 24 (1): 169-74, 2014.23544852
Schlumberger M, Tahara M, Wirth LJ, et al.: Lenvatinib versus placebo in radioiodine-refractory thyroid cancer. N Engl J Med 372 (7): 621-30, 2015.25671254
Mahajan P, Dawrant J, Kheradpour A, et al.: Response to Lenvatinib in Children with Papillary Thyroid Carcinoma. Thyroid 28 (11): 1450-1454, 2018.30226445
Brose MS, Cabanillas ME, Cohen EE, et al.: Vemurafenib in patients with BRAF(V600E)-positive metastatic or unresectable papillary thyroid cancer refractory to radioactive iodine: a non-randomised, multicentre, open-label, phase 2 trial. Lancet Oncol 17 (9): 1272-82, 2016.27460442
Subbiah V, Kreitman RJ, Wainberg ZA, et al.: Dabrafenib and Trametinib Treatment in Patients With Locally Advanced or Metastatic BRAF V600-Mutant Anaplastic Thyroid Cancer. J Clin Oncol 36 (1): 7-13, 2018.29072975
Drilon A, Laetsch TW, Kummar S, et al.: Efficacy of Larotrectinib in TRK Fusion-Positive Cancers in Adults and Children. N Engl J Med 378 (8): 731-739, 2018.29466156
Chu YH, Dias-Santagata D, Farahani AA, et al.: Clinicopathologic and molecular characterization of NTRK-rearranged thyroid carcinoma (NRTC). Mod Pathol 33 (11): 2186-2197, 2020.32457407
Bayer HealthCare Pharmaceuticals: VITRAKVI (larotrectinib): Prescribing Information. Stamford, Conn: Loxo Oncology, Inc., 2018. Available online (https://www.accessdata.fda.gov/drugsatfda_docs/label/2018/211710s000lbl.pdf). Last accessed November 29, 2024.
Wirth LJ, Sherman E, Robinson B, et al.: Efficacy of Selpercatinib in RET-Altered Thyroid Cancers. N Engl J Med 383 (9): 825-835, 2020.32846061
Eli Lilly and Company: RETEVMO (selpercatinib): Prescribing Information. Indianapolis, Ind: Lilly USA, LLC, 2024. Available online (https://www.accessdata.fda.gov/drugsatfda_docs/label/2024/213246s011s013lbl.pdf). Last accessed November 29, 2024.
Brose MS, Robinson B, Sherman SI, et al.: Cabozantinib for radioiodine-refractory differentiated thyroid cancer (COSMIC-311): a randomised, double-blind, placebo-controlled, phase 3 trial. Lancet Oncol 22 (8): 1126-1138, 2021.34237250
Duke ES, Barone AK, Chatterjee S, et al.: FDA Approval Summary: Cabozantinib for Differentiated Thyroid Cancer. Clin Cancer Res 28 (19): 4173-4177, 2022.35679021

## Medullary Thyroid Cancer

Medullary thyroid carcinoma is a rare form of thyroid carcinoma that originates from calcitonin-secreting parafollicular C cells and accounts for less than 10% of all cases of thyroid carcinoma in children.[1]

### Risk Factors

In children, medullary thyroid carcinoma is usually associated with RET germline pathogenic variants in the context of multiple endocrine neoplasia type 2 (MEN2) syndrome.[2] In children, medullary thyroid carcinoma is caused by a dominantly inherited or de novo gain-of-function variant in the RET proto-oncogene associated with either MEN2A or MEN2B, depending on the specific variant.[3] In patients with MEN syndromes, thyroid cancer may be associated with the development of other types of malignant tumors. For more information, see Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment and Multiple Endocrine Neoplasia Type 2 (MEN2).

A single-institution study retrospectively analyzed 144 patients aged 21 years or younger with medullary thyroid carcinoma presenting between 1961 and 2019.[4] The aim of the study was to compare patients with sporadic versus hereditary medullary thyroid carcinoma. In contrast to hereditary medullary thyroid carcinoma (n = 124, 86%), patients with sporadic medullary thyroid carcinoma (n = 20, 14%) were older (P < .0001) and had larger tumors (P < .0001), a higher initial stage grouping (P = .001), more structural disease (P = .0045), and more distant metastases (P = .00084) at last follow-up. Even so, patients with sporadic medullary thyroid carcinoma were not more likely to die of their disease (P = .42).

### Clinical Presentation and Prognostic Factors

Children with thyroid cancer usually present with a thyroid mass with or without painless cervical adenopathy.[5] Based on medical and family history and clinical findings, the thyroid cancer may be part of a tumor predisposition syndrome such as MEN.[6,7]

Children with medullary thyroid carcinoma present with an aggressive clinical course; 50% of patients have hematogenous metastases at diagnosis.[8]

A review of 430 patients aged 0 to 21 years with medullary thyroid cancer reported that worse prognosis was associated with older age (16–21 years) at diagnosis, tumor diameter greater than 2 cm, positive margins after total thyroidectomy, and lymph node metastases.[9]

From 1997 to 2019, the German Society for Pediatric Oncology and Hematology–Malignant Endocrine Tumors registry identified a total of 57 patients with medullary thyroid carcinoma and 17 patients with C-cell hyperplasia.[10][Level of evidence C1] In patients with medullary thyroid carcinoma, the median follow-up was 5 years (range, 0–19 years), and the median age at diagnosis was 10 years (range, 0–17 years).

- The overall survival (OS) rate was 87%, and the event-free survival (EFS) rate was 52%.
- In total, 96.4% of patients were affected by MEN2 syndromes; 37 of 42 patients had MEN2A, and 3 of 28 patients had MEN2B (RET M918T variant).
- The 10-year EFS rates were 78% for patients with MEN2A and 38% for patients with MEN2B (P < .001).
- In multivariate analyses, positive lymph node status and postoperatively elevated calcitonin levels were significant adverse prognostic factors for EFS.

In children with hereditary MEN2B, medullary thyroid carcinoma may be detectable within the first year of life, and nodal metastases may occur before age 5 years. The recognition of mucosal neuromas, a history of alacrima, constipation (secondary to intestinal ganglioneuromatosis), and marfanoid facial features and body habitus is critical to early diagnosis because the RET M918T variant associated with MEN2B is often de novo. Approximately 50% of patients with MEN2B develop a pheochromocytoma. There is a varying degree of risk of developing pheochromocytoma and hyperparathyroidism in MEN2A, based on the specific RET variant.[3,11]

The National Cancer Institute is conducting a natural history study of children and young adults with medullary thyroid cancer (NCT01660984 (https://www.cancer.gov/clinicaltrials/NCT01660984)).

For more information, see Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment.

### Histology and Molecular Features of Medullary Thyroid Cancer

Tumors of the thyroid are classified as adenomas or carcinomas.[12-14] Adenomas are benign, well circumscribed, and encapsulated nodules that may cause notable enlargement of all or part of the gland, which extends to both sides of the neck. Some tumors may secrete hormones. Transformation to a malignant carcinoma may occur in some cells, which may grow and spread to lymph nodes in the neck or to the lungs. Approximately 20% of thyroid nodules in children are malignant.[7,12]

Medullary thyroid carcinoma is a neuroendocrine malignancy derived from the neural crest-originated parafollicular C cells of the thyroid gland. In children, medullary thyroid carcinoma is a monogenic disorder caused by a dominantly inherited or de novo gain-of-function variant in the RET proto-oncogene associated with either MEN2A or MEN2B, depending on the specific variant.[2] The highest risk of medullary thyroid carcinoma is conferred by the RET M918T variant, which is associated with MEN2B. The RET variants associated with MEN2A confer a lower risk of medullary thyroid carcinoma.[3]

### Treatment of Medullary Thyroid Carcinoma

Medullary thyroid carcinomas are commonly associated with the MEN2 syndrome. For more information, see Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment and Multiple Endocrine Neoplasia Type 2 (MEN2).

Treatment options for medullary thyroid carcinoma include the following:

1. Surgery.
2. Tyrosine kinase inhibitor (TKI) therapy.

#### Surgery

Treatment for children with medullary thyroid carcinoma is mainly surgical. Investigators have concluded that prophylactic central node dissection should not be performed on patients with hereditary medullary thyroid cancer if their basal calcitonin serum levels are lower than 40 pg/mL.[15]

Most cases of medullary thyroid carcinoma in children occur in the context of the MEN2A and MEN2B syndromes. In those familial cases, early genetic testing and counseling is indicated, and prophylactic surgery is recommended for children with the RET germline pathogenic variant. Strong genotype-phenotype correlations have facilitated the development of guidelines for intervention, including screening and age at which prophylactic thyroidectomy should occur.[11]

Evidence (surgery):

1. A retrospective analysis identified 167 children with RET variants who underwent prophylactic thyroidectomy. This group included 109 patients without a concomitant central node dissection and 58 patients with a concomitant central node dissection. Postoperative hypoparathyroidism was more frequent in older children (32% in the oldest age group vs. 3% in the youngest age group; P = .002), regardless of whether central node dissection was carried out. Three children developed recurrent laryngeal nerve palsy after undergoing central node dissection (P = .040). All complications resolved within 6 months. Postoperative normalization of calcitonin serum levels was achieved in 114 of 115 children (99.1%) with raised preoperative values. Children were classified into risk groups by their specific type of RET variant (see Table 2).[16]
  - In the highest-risk category, medullary thyroid carcinoma was found in five of six children (83%) aged 3 years or younger.
  - In the high-risk category, medullary thyroid carcinoma was present in 6 of 20 children (30%) aged 3 years or younger, 16 of 36 children (44%) aged 4 to 6 years, and 11 of 16 children (69%) aged 7 to 12 years (P = .081).
  - In the moderate-risk category, medullary thyroid carcinoma was seen in one of nine children (11%) aged 3 years or younger, 1 of 26 children (4%) aged 4 to 6 years, 3 of 26 children (12%) aged 7 to 12 years, and 7 of 16 children (44%) aged 13 to 18 years (P = .006).

The American Thyroid Association has proposed the following guidelines for prophylactic thyroidectomy in children with hereditary medullary thyroid carcinoma (see Table 2).[11]

Table 2. Risk Levels and Management Based on Common RET Variants Detected by Genetic Screening^a^

| Medullary Thyroid Carcinoma Risk Level
| Highest (MEN2B) | High (MEN2A) | Moderate (MEN2A)
RET Variant | M918T | A883F, C634F/G/R/S/W/Y | G533C, C609F/G/R/S/Y, C611F/G/S/Y/W, C618F/R/S, C620F/R/S, C630R/Y, D631Y, K666E, E768D, L790F, V804L, V804M, S891A, R912P
Age for Prophylactic Thyroidectomy | Total thyroidectomy in the first year of life, ideally in the first months of life. | Total thyroidectomy at or before age 5 y based on serum calcitonin level. | Total thyroidectomy to be performed when the serum calcitonin level is above the normal range or at convenience if the parents do not wish to embark on a lengthy period of surveillance.

MEN2A = multiple endocrine neoplasia type 2A; MEN2B = multiple endocrine neoplasia type 2B.

^a^Adapted from Wells et al.[11]

#### Tyrosine kinase inhibitor (TKI) therapy

A number of TKIs have been evaluated and approved for patients with advanced medullary thyroid carcinoma.

- Vandetanib. Vandetanib is an inhibitor of the RET kinase, VEGFR, and EGFR signaling. The U.S. Food and Drug Administration (FDA) approved vandetanib for the treatment of symptomatic or progressive medullary thyroid cancer in adult patients with unresectable, locally advanced, or metastatic disease. The approval was based on a randomized, placebo-controlled, phase III trial that showed a marked progression-free survival (PFS) improvement for patients randomly assigned to receive vandetanib (hazard ratio, 0.35). The trial also showed an objective response rate advantage for patients receiving vandetanib (44% vs. 1% for the placebo arm).[17,18]
  Children with locally advanced or metastatic medullary thyroid carcinoma were treated with vandetanib in a phase I/II trial. Of 16 patients, only 1 had no response, and 7 had partial responses, for an objective response rate of 44%. Disease in three of those patients subsequently recurred, but 11 of 16 patients treated with vandetanib remained on therapy at the time of the report. The median duration of therapy for the entire cohort was 27 months, with a range of 2 to 52 months.[19] A long-term outcome evaluation in a cohort of 17 children and adolescents with advanced medullary thyroid carcinoma who received vandetanib reported a median PFS of 6.7 years and a 5-year OS rate of 88.2%.[20]
- Cabozantinib. Cabozantinib is an inhibitor of the RET and MET kinases and VEGFR. It has also shown activity against unresectable medullary thyroid cancer (10 of 35 adult patients [29%] had partial responses).[21] A double-blind phase III trial compared cabozantinib with placebo in adults with progressive, metastatic medullary thyroid carcinoma.[22] The estimated PFS was 11.2 months for patients who received cabozantinib and 4 months for patients who received the placebo. At 1 year, 47.3% of patients who were treated with cabozantinib were alive and progression free, compared with 7.2% of patients who received the placebo. Significant adverse effects resulted in dose reductions in 79% of patients and discontinuation of cabozantinib in 16% of patients. The FDA approved cabozantinib in 2012 for the treatment of adults with metastatic medullary thyroid cancer.
- Selpercatinib. Selpercatinib is a RET inhibitor. A phase I/II trial of selpercatinib therapy for patients with RET-altered cancers enrolled 55 patients with medullary thyroid cancer (age range, 17–84 years) who were previously treated with vandetanib and/or cabozantinib and 88 patients with medullary thyroid cancer (age range, 15–82 years) who were not previously treated with vandetanib or cabozantinib.[23]
  - For the previously treated cohort, 69% of patients had objective responses, and the median duration of response had not been reached, with a median follow-up of 14 months.
  - For the cohort of patients who were not previously treated, 73% of patients had objective responses, with a median duration of response of 22 months.
  - The most common grades 3 to 4 treatment-related adverse events were hypertension (12%), increased alanine aminotransferase (10%) and aspartate aminotransferase (7%), diarrhea (3%), and prolonged QT interval (2%).
  - In a small cohort of six children with recurrent medullary thyroid carcinoma who were treated with selpercatinib, all patients had ongoing responses at a median follow-up of 13 months.[24]
  - In 2024, the FDA granted full approval to selpercatinib for the treatment of adult and pediatric patients aged 2 years and older with advanced or metastatic RET fusion–positive medullary thyroid cancer who require systemic therapy.[25]

For more information, see Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment and Multiple Endocrine Neoplasia Type 2 (MEN2).

#### Treatment options under clinical evaluation for medullary thyroid carcinoma

Information about National Cancer Institute (NCI)–supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

### References

Dermody S, Walls A, Harley EH: Pediatric thyroid cancer: An update from the SEER database 2007-2012. Int J Pediatr Otorhinolaryngol 89: 121-6, 2016.27619041
Viola D, Romei C, Elisei R: Medullary thyroid carcinoma in children. Endocr Dev 26: 202-13, 2014.25231454
Bauer AJ: Molecular Genetics of Thyroid Cancer in Children and Adolescents. Endocrinol Metab Clin North Am 46 (2): 389-403, 2017.28476228
Hensley SG, Hu MI, Bassett RL, et al.: Pediatric Medullary Thyroid Carcinoma: Clinical Presentations and Long-Term Outcomes in 144 Patients Over 6 Decades. J Clin Endocrinol Metab 109 (9): 2256-2268, 2024.38441533
Al-Qurayshi Z, Hauch A, Srivastav S, et al.: A National Perspective of the Risk, Presentation, and Outcomes of Pediatric Thyroid Cancer. JAMA Otolaryngol Head Neck Surg 142 (5): 472-8, 2016.27031884
Acquaviva G, Visani M, Repaci A, et al.: Molecular pathology of thyroid tumours of follicular cells: a review of genetic alterations and their clinicopathological relevance. Histopathology 72 (1): 6-31, 2018.29239040
Francis GL, Waguespack SG, Bauer AJ, et al.: Management Guidelines for Children with Thyroid Nodules and Differentiated Thyroid Cancer. Thyroid 25 (7): 716-59, 2015.25900731
Waguespack SG, Rich TA, Perrier ND, et al.: Management of medullary thyroid carcinoma and MEN2 syndromes in childhood. Nat Rev Endocrinol 7 (10): 596-607, 2011.21862994
Raval MV, Sturgeon C, Bentrem DJ, et al.: Influence of lymph node metastases on survival in pediatric medullary thyroid cancer. J Pediatr Surg 45 (10): 1947-54, 2010.20920711
Kuhlen M, Frühwald MC, Dunstheimer DPA, et al.: Revisiting the genotype-phenotype correlation in children with medullary thyroid carcinoma: A report from the GPOH-MET registry. Pediatr Blood Cancer 67 (4): e28171, 2020.31925938
Wells SA, Asa SL, Dralle H, et al.: Revised American Thyroid Association guidelines for the management of medullary thyroid carcinoma. Thyroid 25 (6): 567-610, 2015.25810047
Dinauer C, Francis GL: Thyroid cancer in children. Endocrinol Metab Clin North Am 36 (3): 779-806, vii, 2007.17673128
Vasko V, Bauer AJ, Tuttle RM, et al.: Papillary and follicular thyroid cancers in children. Endocr Dev 10: 140-72, 2007.17684395
Halac I, Zimmerman D: Thyroid nodules and cancers in children. Endocrinol Metab Clin North Am 34 (3): 725-44, x, 2005.16085168
Machens A, Elwerr M, Thanh PN, et al.: Impact of central node dissection on postoperative morbidity in pediatric patients with suspected or proven thyroid cancer. Surgery 160 (2): 484-92, 2016.27117577
Machens A, Elwerr M, Lorenz K, et al.: Long-term outcome of prophylactic thyroidectomy in children carrying RET germline mutations. Br J Surg 105 (2): e150-e157, 2018.29341155
Wells SA, Robinson BG, Gagel RF, et al.: Vandetanib in patients with locally advanced or metastatic medullary thyroid cancer: a randomized, double-blind phase III trial. J Clin Oncol 30 (2): 134-41, 2012.22025146
Thornton K, Kim G, Maher VE, et al.: Vandetanib for the treatment of symptomatic or progressive medullary thyroid cancer in patients with unresectable locally advanced or metastatic disease: U.S. Food and Drug Administration drug approval summary. Clin Cancer Res 18 (14): 3722-30, 2012.22665903
Fox E, Widemann BC, Chuk MK, et al.: Vandetanib in children and adolescents with multiple endocrine neoplasia type 2B associated medullary thyroid carcinoma. Clin Cancer Res 19 (15): 4239-48, 2013.23766359
Kraft IL, Akshintala S, Zhu Y, et al.: Outcomes of Children and Adolescents with Advanced Hereditary Medullary Thyroid Carcinoma Treated with Vandetanib. Clin Cancer Res 24 (4): 753-765, 2018.29187393
Kurzrock R, Sherman SI, Ball DW, et al.: Activity of XL184 (Cabozantinib), an oral tyrosine kinase inhibitor, in patients with medullary thyroid cancer. J Clin Oncol 29 (19): 2660-6, 2011.21606412
Elisei R, Schlumberger MJ, Müller SP, et al.: Cabozantinib in progressive medullary thyroid cancer. J Clin Oncol 31 (29): 3639-46, 2013.24002501
Wirth LJ, Sherman E, Robinson B, et al.: Efficacy of Selpercatinib in RET-Altered Thyroid Cancers. N Engl J Med 383 (9): 825-835, 2020.32846061
Shankar A, Kurzawinski T, Ross E, et al.: Treatment outcome with a selective RET tyrosine kinase inhibitor selpercatinib in children with multiple endocrine neoplasia type 2 and advanced medullary thyroid carcinoma. Eur J Cancer 158: 38-46, 2021.34649088
Eli Lilly and Company: RETEVMO (selpercatinib): Prescribing Information. Indianapolis, Ind: Lilly USA, LLC, 2024. Available online (https://www.accessdata.fda.gov/drugsatfda_docs/label/2024/213246s011s013lbl.pdf). Last accessed November 29, 2024.

## Special Considerations for the Treatment of Children With Cancer

Cancer in children and adolescents is rare, although the overall incidence has slowly increased since 1975.[1] Children and adolescents with cancer should be referred to medical centers that have a multidisciplinary team of cancer specialists with experience treating the cancers that occur during childhood and adolescence. This multidisciplinary team approach incorporates the skills of the following pediatric specialists and others to ensure that children receive treatment, supportive care, and rehabilitation to achieve optimal survival and quality of life:

- Primary care physicians.
- Pediatric surgeons.
- Pathologists.
- Pediatric radiation oncologists.
- Pediatric medical oncologists and hematologists.
- Ophthalmologists.
- Rehabilitation specialists.
- Pediatric oncology nurses.
- Social workers.
- Child-life professionals.
- Psychologists.
- Nutritionists.

For specific information about supportive care for children and adolescents with cancer, see the summaries on Supportive and Palliative Care (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care).

The American Academy of Pediatrics has outlined guidelines for pediatric cancer centers and their role in the treatment of children and adolescents with cancer.[2] At these centers, clinical trials are available for most types of cancer that occur in children and adolescents, and the opportunity to participate is offered to most patients and their families. Clinical trials for children and adolescents diagnosed with cancer are generally designed to compare potentially better therapy with current standard therapy. Other types of clinical trials test novel therapies when there is no standard therapy for a cancer diagnosis. Most of the progress in identifying curative therapies for childhood cancers has been achieved through clinical trials. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

Dramatic improvements in survival have been achieved for children and adolescents with cancer. Between 1975 and 2020, childhood cancer mortality decreased by more than 50%.[3-5] Childhood and adolescent cancer survivors require close monitoring because side effects of cancer therapy may persist or develop months or years after treatment. For information about the incidence, type, and monitoring of late effects in childhood and adolescent cancer survivors, see Late Effects of Treatment for Childhood Cancer.

Childhood cancer is a rare disease, with about 15,000 cases diagnosed annually in the United States in individuals younger than 20 years.[6] The U.S. Rare Diseases Act of 2002 (https://www.congress.gov/107/plaws/publ280/PLAW-107publ280.pdf) defines a rare disease as one that affects populations smaller than 200,000 people in the United States. Therefore, all pediatric cancers are considered rare.

The designation of a rare tumor is not uniform among pediatric and adult groups. In adults, rare cancers are defined as those with an annual incidence of fewer than six cases per 100,000 people. They account for up to 24% of all cancers diagnosed in the European Union and about 20% of all cancers diagnosed in the United States.[7,8] In children and adolescents, the designation of a rare tumor is not uniform among international groups, as follows:

- A consensus effort between the European Union Joint Action on Rare Cancers and the European Cooperative Study Group for Rare Pediatric Cancers estimated that 11% of all cancers in patients younger than 20 years could be categorized as very rare. This consensus group defined very rare cancers as those with annual incidences of fewer than two cases per 1 million people. However, three additional histologies (thyroid carcinoma, melanoma, and testicular cancer) with incidences of more than two cases per 1 million people were also included in the very rare group due to a lack of knowledge and expertise in the management of these tumors.[9]
- The Children's Oncology Group defines rare pediatric cancers as those listed in the International Classification of Childhood Cancer subgroup XI, which includes thyroid cancers, melanomas and nonmelanoma skin cancers, and multiple types of carcinomas (e.g., adrenocortical carcinomas, nasopharyngeal carcinomas, and most adult-type carcinomas such as breast cancers and colorectal cancers).[10] These diagnoses account for about 5% of the cancers diagnosed in children aged 0 to 14 years and about 27% of the cancers diagnosed in adolescents aged 15 to 19 years.[4]
  Most cancers in subgroup XI are either melanomas or thyroid cancers, with other cancer types accounting for only 2% of the cancers diagnosed in children aged 0 to 14 years and 9.3% of the cancers diagnosed in adolescents aged 15 to 19 years.

These rare cancers are extremely challenging to study because of the relatively few patients with any individual diagnosis, the predominance of rare cancers in the adolescent population, and the small number of clinical trials for adolescents with rare cancers.

Information about these tumors may also be found in sources relevant to adults with cancer, such as Thyroid Cancer Treatment.

### References

Smith MA, Seibel NL, Altekruse SF, et al.: Outcomes for children and adolescents with cancer: challenges for the twenty-first century. J Clin Oncol 28 (15): 2625-34, 2010.20404250
American Academy of Pediatrics: Standards for pediatric cancer centers. Pediatrics 134 (2): 410-4, 2014. Also available online (https://pediatrics.aappublications.org/content/134/2/410). Last accessed February 25, 2025.
Smith MA, Altekruse SF, Adamson PC, et al.: Declining childhood and adolescent cancer mortality. Cancer 120 (16): 2497-506, 2014.24853691
National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
Ward E, DeSantis C, Robbins A, et al.: Childhood and adolescent cancer statistics, 2014. CA Cancer J Clin 64 (2): 83-103, 2014 Mar-Apr.24488779
Gatta G, Capocaccia R, Botta L, et al.: Burden and centralised treatment in Europe of rare tumours: results of RARECAREnet-a population-based study. Lancet Oncol 18 (8): 1022-1039, 2017.28687376
DeSantis CE, Kramer JL, Jemal A: The burden of rare cancers in the United States. CA Cancer J Clin 67 (4): 261-272, 2017.28542893
Ferrari A, Brecht IB, Gatta G, et al.: Defining and listing very rare cancers of paediatric age: consensus of the Joint Action on Rare Cancers in cooperation with the European Cooperative Study Group for Pediatric Rare Tumors. Eur J Cancer 110: 120-126, 2019.30785015
Pappo AS, Krailo M, Chen Z, et al.: Infrequent tumor initiative of the Children's Oncology Group: initial lessons learned and their impact on future plans. J Clin Oncol 28 (33): 5011-6, 2010.20956621

## Latest Updates to This Summary (04/03/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Differentiated Thyroid Cancer (Papillary/Follicular)

Added text to state that some sections of this summary provide an overview of the American Thyroid Association guidelines and the proposed revisions, which are presented here without a specific endorsement by the National Cancer Institute.

This summary is written and maintained by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of childhood thyroid cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Childhood Thyroid Cancer Treatment are:

- Denise Adams, MD (Children's Hospital Boston)
- Karen J. Marcus, MD, FACR (Dana-Farber of Boston Children's Cancer Center and Blood Disorders Harvard Medical School)
- William H. Meyer, MD
- Paul A. Meyers, MD (Memorial Sloan-Kettering Cancer Center)
- Thomas A. Olson, MD (Aflac Cancer and Blood Disorders Center of Children's Healthcare of Atlanta - Egleston Campus)
- Arthur Kim Ritchey, MD (Children's Hospital of Pittsburgh of UPMC)
- Carlos Rodriguez-Galindo, MD (St. Jude Children's Research Hospital)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Pediatric Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Thyroid Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/thyroid/hp/child-thyroid-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389315]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).